# Colorectal Cancer Screening (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about colorectal cancer screening. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Summary of Evidence

Note: The Summary of Evidence section summarizes the published evidence on this topic. The rest of the summary describes the evidence in more detail.

Other PDQ summaries on Colorectal Cancer Prevention; Colon Cancer Treatment; and Rectal Cancer Treatment are also available.

### Evidence of Benefit Associated With Colorectal Cancer Screening

Based on solid evidence, screening for colorectal cancer (CRC) reduces CRC mortality. In addition, there is solid evidence that some CRC screening modalities also reduce CRC incidence. A meta-analysis of randomized controlled trials of flexible sigmoidoscopy found that screening with sigmoidoscopy reduces all-cause mortality.

Table 1. Effect of Screening Intervention on Reducing Incidence and Mortality from Colorectal Cancer^a^

Screening Intervention | Study Design | Internal Validity | Consistency | Magnitude of Effect on CRC Incidence | Magnitude of Effect on CRC Mortality | External Validity
Fecal Occult Blood Test (guaiac-based) | RCTs [7] | Good | Good | Likely small to none | 15%–33% | Fair
Fecal Occult Blood Test (fecal immunochemical-based: FIT) | RCTs ongoing^b^ | Fair | Fair | Fair | Fair | Fair
Sigmoidoscopy | RCTs | Good | Good | 20%–25% | 22%–31%; 13%–50% for distal colon | Fair
Digital Rectal Exam | Case-control studies | Fair | Good | No effect | No effect | Poor
Colonoscopy | One RCT (RCTs in-progress)^c^; case-control studies; observational cohort studies that use historical/other controls | Poor | Poor | About 60%–70% for left colon; uncertain for right colon^c^[6] | About 60%–70% for distal colon; uncertain for right colon | Fair

CRC = colorectal cancer; FIT = fecal immunochemical testing; RCT = randomized controlled trial.

^a^There are no data from RCTs on the effect of other screening interventions (i.e., barium enema, computed tomographic colonography, and stool DNA mutation tests) on mortality from CRC. There are also no published results of RCTs of FIT with mortality as an end point.

^b^FIT is being compared with colonoscopy in two RCTs in Europe (NCT00906997 (https://www.cancer.gov/clinicaltrials/NCT00906997) [Spain] and NCT02078804 (https://www.cancer.gov/clinicaltrials/NCT02078804) [Sweden]), one in the United States (NCT01239082 (https://www.cancer.gov/clinicaltrials/NCT01239082)), and one in China (ChiCTR1900025257 (https://www.chictr.org.cn/showprojEN.html?proj=42159)).[1,2] The trial in Sweden compares colonoscopy with FIT and population controls. Mortality results are not available and may be limited for FIT because of the absence of no-screening comparison groups in several trials. Current guideline recommendations have depended on FIT using the same mechanism as guaiac tests, the most sensitive of which had similar sensitivity to FIT [3] and showed significant reductions in both mortality and incidence of CRC.[3-5]

^c^The NordICC trial compares a colonoscopy group with a usual-care control group [NCT00883792 (https://www.cancer.gov/clinicaltrials/NCT00883792)].[6]

### References

Quintero E, Castells A, Bujanda L, et al.: Colonoscopy versus fecal immunochemical testing in colorectal-cancer screening. N Engl J Med 366 (8): 697-706, 2012.22356323
Dominitz JA, Robertson DJ, Ahnen DJ, et al.: Colonoscopy vs. Fecal Immunochemical Test in Reducing Mortality From Colorectal Cancer (CONFIRM): Rationale for Study Design. Am J Gastroenterol 112 (11): 1736-1746, 2017.29016565
Church TR, Ederer F, Mandel JS: Fecal occult blood screening in the Minnesota study: sensitivity of the screening test. J Natl Cancer Inst 89 (19): 1440-8, 1997.9326913
Mandel JS, Church TR, Bond JH, et al.: The effect of fecal occult-blood screening on the incidence of colorectal cancer. N Engl J Med 343 (22): 1603-7, 2000.11096167 20527307
Mandel JS, Bond JH, Church TR, et al.: Reducing mortality from colorectal cancer by screening for fecal occult blood. Minnesota Colon Cancer Control Study. N Engl J Med 328 (19): 1365-71, 1993.8474513 93233727
Bretthauer M, Løberg M, Wieszczy P, et al.: Effect of Colonoscopy Screening on Risks of Colorectal Cancer and Related Death. N Engl J Med 387 (17): 1547-1556, 2022.36214590
Hewitson P, Glasziou P, Watson E, et al.: Cochrane systematic review of colorectal cancer screening using the fecal occult blood test (hemoccult): an update. Am J Gastroenterol 103 (6): 1541-9, 2008.18479499

## Significance

### Background

Colorectal cancer (CRC) is the third most common malignant neoplasm worldwide [1] and the second leading cause of cancer deaths in the United States.[2] It is estimated that in 2025 there will be 154,270 new cases diagnosed in the United States and 52,900 deaths due to this disease. From 2012 to 2021, incidence rates for CRC declined by about 1% per year overall due to screening uptake and changing patterns in risk factors. However, this declining incidence is confined to individuals aged 65 years and older. Between 2012 and 2021, incidence rates increased by 2.4% per year in individuals younger than 55 years and by 0.4% per year in individuals aged 50 to 64 years. Over the last decade, the mortality rate from CRC declined by 1.7% per year in both men and women.[2] Incidence is higher in men than in women. The incidence rates range from 34.5 per 100,000 per year in Asian or Pacific Islander men to 53.6 per 100,000 per year in American Indian or Alaska Native men. In women, the incidence rates range from 25.3 per 100,000 per year in Asian or Pacific Islander women to 45.5 per 100,000 per year in American Indian or Alaska Native women. The age-adjusted mortality rates are 15.4 per 100,000 per year in men and 10.8 per 100,000 per year in women. About 4.0% of Americans are expected to develop the disease within their lifetime, and the lifetime risk of dying from CRC is 1.4%.[3] Age-specific incidence and mortality rates show that most cases are diagnosed after age 54 years and 77% of cases occur in individuals aged 55 years and older; about 15% of CRC cases occur in individuals aged 45 to 54 years.[3-5]

An analysis of national data for 1975 to 2010 addressed long-term trends in CRC.[6] Incidence increased for men from 1975 to 1985, but there were marked declines from 1985 to 1995 for both men and women, followed by a nonsignificant increase from 1995 to 1998, then marked declines from 1998 to 2010. Death rates from CRC have declined since 1984 in both men and women, with an accelerated rate of decline since 2002 for men and since 2001 for women. From 1997 to 2010, CRC incidence declined for all racial and ethnic groups. The fastest annual rate of decline occurred in men and women aged 65 years or older. There was a trend of increasing short-term incidence rates for individuals younger than 50 years in most population subgroups. Incidence rates of distal colon and rectal cancers decreased in men and women for all ages combined. Incidence rates of proximal colon cancer also decreased in men and women for all races and ethnicities combined.

### Risk Factors

#### Age and family history

The main risk factor for CRC is increasing age; 90% of all CRCs are diagnosed after age 50 years. History of CRC in a first-degree relative, especially when diagnosed before age 55 years, approximately doubles the risk.

#### Adenomas

The presence of adenomas (lesions considered to be the histological [neoplastic but nonmalignant] precursors of CRC) is another major risk factor. Adenomas are extremely common. For example, in individuals older than 50 years, the prevalence of adenomas is approximately 30% but can be as high as 50% with the use of high-definition endoscopes, which can detect 1-mm to 2-mm adenomas.[7,8] Adenomas confer risk as they may themselves evolve into CRC. Additionally, even after removal, an adenoma (particularly if it is high risk based on size and histology) may indicate future risk of CRC. Managing adenomas and risk is challenging because adenomas are prevalent as people age, but most will never become CRC.

Understanding risk and risk management has been complicated by the intense focus on adenoma-detection rates in the last 15 years, which has led to increased detection of adenomas, especially very small ones (<0.5 cm). Risk factors for developing CRC are not completely understood, but generally include the following:

- Personal history of CRC or high-risk adenomas.
- Large adenomas (>1 cm).
- Multiple adenomas (>3).
- Adenomas with an advanced or worrisome histology (severe dysplasia; serrated, especially in the proximal colon).
- Flat or difficult-to-detect lesions (including serrated polyps, which may be more common in the right colon than in the left colon.)

Increased future risk of CRC is indicated by a personal history of CRC or high-risk adenomas (i.e., large [>1 cm] tubular adenomas, sessile-serrated adenomas, or multiple adenomas). Follow-up of individuals with these adenomas after they have undergone screening is considered surveillance and not screening.[9]

The term serrated polyp includes hyperplastic polyps, sessile-serrated adenomas, traditional-serrated adenomas, and mixed-serrated polyps.[10,11] The clinical significance of these lesions is uncertain because the natural history of any polypoid lesion is difficult to learn. However, the histological and molecular characteristics of some serrated lesions suggest possibly important malignant potential (e.g., mutations in the BRAF gene may be an early step toward carcinogenesis in serrated polyps).[12]

#### Prevalence of adenomas and CRC in asymptomatic populations

In a colonoscopy study of 3,121 predominantly male U.S. veterans (mean age, 63 years), advanced neoplasia (defined as an adenoma ≥10 mm in diameter, a villous adenoma, an adenoma with high-grade dysplasia, or invasive cancer) was identified in 10.5% of the individuals.[8] Among patients with no adenomas distal to the splenic flexure, 2.7% had advanced proximal neoplasia. Patients with large adenomas (≥10 mm) or small adenomas (<10 mm) in the distal colon were more likely to have advanced proximal neoplasia (odds ratio [OR], 3.4; 90% confidence interval [CI], 1.8–6.5) than were patients with no distal adenomas (OR, 2.6; 90% CI, 1.7–4.1). One-half of those with advanced proximal neoplasia had no distal adenomas. In a study of 1,994 adults aged 50 years or older who underwent colonoscopy screening as part of a program sponsored by an employer, 5.6% of adults had advanced neoplasms.[7] Forty-six percent of those with advanced proximal neoplasms had no distal polyps (hyperplastic or adenomatous). If colonoscopy screening had been performed only in patients with distal polyps, about one-half of the cases of advanced proximal neoplasia would not have been detected.

Analysis of data from a colonoscopy-based screening program in Warsaw, Poland, demonstrated higher rates of advanced neoplasia in men than in women. Of the 43,042 participants aged 50 to 66 years, advanced neoplasia was detected in 5.9% of participants (5.7% in women with a family history of CRC, 4.3% in women without a family history of CRC, 12.2% in men with a family history of CRC, and 8.0% in men without a family history of CRC).

In a cohort study within the Polish Colonoscopy Screening Program, nearly 166,000 participants were followed for up to 17 years after a single negative colonoscopy. Standardized incidence ratios that compared the participants to the general population were 0.32 (95% CI, 0.29–0.35) for low-quality colonoscopy (LQC) and 0.16 (95% CI, 0.13–0.20) for high-quality colonoscopy (HQC). Standardized mortality ratios were 0.22 (95% CI, 0.18–0.25) for LQC and 0.10 (95% CI, 0.06–0.14) for HQC. Colonoscopy, especially HQC, was predictive of low CRC incidence and mortality for at least 10 years after a negative exam, suggesting that the currently recommended 10-year interval for screening is safe and could potentially be extended.[13]

### References

Bray F, Laversanne M, Sung H, et al.: Global cancer statistics 2022: GLOBOCAN estimates of incidence and mortality worldwide for 36 cancers in 185 countries. CA Cancer J Clin 74 (3): 229-263, 2024.38572751
American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.
National Cancer Institute: SEER Stat Fact Sheets: Colorectal Cancer. Bethesda, Md: National Institutes of Health. Available online (https://seer.cancer.gov/statfacts/html/colorect.html). Last accessed April 10, 2024.
Imperiale TF, Wagner DR, Lin CY, et al.: Results of screening colonoscopy among persons 40 to 49 years of age. N Engl J Med 346 (23): 1781-5, 2002.12050337
Edwards BK, Noone AM, Mariotto AB, et al.: Annual Report to the Nation on the status of cancer, 1975-2010, featuring prevalence of comorbidity and impact on survival among persons with lung, colorectal, breast, or prostate cancer. Cancer 120 (9): 1290-314, 2014.24343171
Imperiale TF, Wagner DR, Lin CY, et al.: Risk of advanced proximal neoplasms in asymptomatic adults according to the distal colorectal findings. N Engl J Med 343 (3): 169-74, 2000.10900275 20344353
Lieberman DA, Weiss DG, Bond JH, et al.: Use of colonoscopy to screen asymptomatic adults for colorectal cancer. Veterans Affairs Cooperative Study Group 380. N Engl J Med 343 (3): 162-8, 2000.10900274 20344352
Lieberman DA, Rex DK, Winawer SJ, et al.: Guidelines for colonoscopy surveillance after screening and polypectomy: a consensus update by the US Multi-Society Task Force on Colorectal Cancer. Gastroenterology 143 (3): 844-57, 2012.22763141
Kahi CJ, Hewett DG, Norton DL, et al.: Prevalence and variable detection of proximal colon serrated polyps during screening colonoscopy. Clin Gastroenterol Hepatol 9 (1): 42-6, 2011.20888435
Snover DC, Batts KP: Serrated Colorectal Neoplasia. Surg Pathol Clin 3 (2): 207-40, 2010.26839130
Snover DC, Jass JR, Fenoglio-Preiser C, et al.: Serrated polyps of the large intestine: a morphologic and molecular review of an evolving concept. Am J Clin Pathol 124 (3): 380-91, 2005.16191506
Pilonis ND, Bugajski M, Wieszczy P, et al.: Long-Term Colorectal Cancer Incidence and Mortality After a Single Negative Screening Colonoscopy. Ann Intern Med 173 (2): 81-91, 2020.32449884

## Evidence of Benefit

### Fecal Occult Blood Test (FOBT)

In FOBT testing, stool samples are collected and analyzed for the presence of small amounts of blood. The first generation of FOBTs used guaiac-based assays to detect blood, which are less sensitive and less specific than immunochemical-based testing. The now-classic randomized controlled trials (RCTs) that assessed colorectal cancer (CRC) mortality reduction all used guaiac-based testing. The finding of decreased CRC mortality provided a major foundation to draft CRC screening recommendations. The first-generation guaiac-based tests are being replaced with more sensitive and more specific immunochemical tests, which have not yet been assessed in RCTs with a no-screening control group.

In this setting, the RCT evidence about guaiac-based testing is reviewed briefly here, with further discussion of how immunochemical FOBT (iFOBT or FIT) may provide improved sensitivity and specificity. Generally, if guaiac FOBT (gFOBT) is acceptable as a screening test (as shown in RCTs), then a strong case can be made for using a more sensitive and more specific test like FIT.

gFOBT collection details vary somewhat for different tests, but they typically involve collection of as many as three different specimens on 3 different days, with small amounts from one specimen smeared by a wooden stick on a card with two windows or otherwise placed in a specimen container.

The guaiac test identifies peroxidase-like activity that is characteristic of human and nonhuman hemoglobin. Thus, the test records blood from ingested meat, upper airway bleeding such as epistaxis, upper gastrointestinal (GI) bleeding, and colonic lesions.

A systematic review regarding evidence of benefit was conducted through the Cochrane Collaboration. It examined all CRC screening randomized trials that involved gFOBT testing done on more than one occasion. The combined results showed that trial participants allocated to screening had a 16% lower CRC mortality (relative risk [RR], 0.84; 95% confidence interval [CI], 0.78–0.90). There was no difference in all-cause mortality between the screened groups and the control groups (RR, 1.00; 95% CI, 0.99–1.02). The trials reported a low positive predictive value (PPV) for the FOBT test, suggesting that most positive tests were false positives. The PPV was 5.0% to 18.7% in the trials using nonrehydrated slides (Funen and Nottingham studies), and it was 0.9% to 6.1% in the trials using rehydrated slides (Goteborg and Minnesota studies). The report contained no discussion about contamination in the control arms of the trials and no information about treatment by disease stage.[1,2]

On initial (prevalence) examinations, 1% to 5% of unselected individuals tested with gFOBT had positive test results. Of those who tested positive, approximately 2% to 10% had cancer and approximately 20% to 30% had adenomas,[3,4] depending on how the test was done. Data from RCTs of gFOBT testing are summarized in Table 2.

Four controlled clinical trials to evaluate the efficacy of screening with gFOBT have been completed or are in progress. While more sensitive stool blood tests based on measuring human hemoglobin have been developed (and are discussed later in this summary), results of their performance in RCTs have not yet been reported. For gFOBT, the Swedish trial was a targeted study for individuals aged 60 to 64 years.[5] The English trial selected candidates from lists of family practitioners.[6] The Danish trial offered screening to a population aged 45 to 75 years who were randomly assigned to a control or study group.[7,8]

The Minnesota trial randomly assigned 46,551 men and women aged 50 to 80 years to one of three arms: (1) CRC screening with gFOBT, (2) rehydrated (with some small percentage of unrehydrated) FOBT every year (n = 15,570) or (3) every 2 years (n = 15,587), or a control group (n = 15,394). This trial demonstrated that annual FOBT screening decreased mortality from CRC by 33% after 18 years of follow-up (RR, 0.67; 95% CI, 0.51–0.83, compared with the control group) and that biennial testing resulted in a 21% relative mortality reduction (RR, 0.79; 95% CI, 0.62–0.97).[9] Some part of the reduction may have been attributed to chance detection of cancer by colonoscopies; rehydration of guaiac test slides greatly increased positivity and consequently increased the number of colonoscopies performed.[10] Subsequent analyses by the Minnesota investigators using mathematical modeling suggested that for 75% to 84% of the patients, mortality reduction was achieved because of sensitive detection of CRCs by the test; chance detection played a modest role (16%–25% of the reduction).[11] Nearly 85% of patients with a positive test underwent diagnostic procedures that included colonoscopy or double-contrast barium enema plus flexible sigmoidoscopy (FS). After 18 years of follow-up, the incidence of CRC was reduced by 20% in the annually screened arm and 17% in the biennially screened arm. With follow-up through 30 years, there was a sustained reduction in CRC mortality of 32% in the annually screened arm (RR, 0.68; 95% CI, 0.56–0.82) and 22% in the biennially screened arm (RR, 0.78; 95% CI, 0.65–0.93). There was no reduction in all-cause mortality in either screened arm (RR, 1.00; 95% CI, 0.99–1.01 for the annually screened arm and RR, 0.99; 95% CI, 0.98–1.01 for the biennially screened arm).[12] Important information that was not reported includes the treatment of CRC cases by stage by arm and the extent of CRC screening in each arm by FOBT, sigmoidoscopy, or colonoscopy after the completion of the trial protocol.[12,13]

The English trial allocated approximately 76,000 individuals to each arm. Those in the screened arm were offered nonrehydrated gFOBT testing every 2 years for three to six rounds from 1985 to 1995. At a median follow-up of 7.8 years, 60% completed at least one test, and 38% completed all tests. Cumulative incidence of CRC was similar in both arms, and the trial reported an RR reduction of 15% in CRC mortality (odds ratio [OR], 0.85; 95% CI, 0.74–0.98).[14] The serious complication rate of colonoscopy was 0.5%. There were five deaths within 30 days of surgery for screen-detected CRC or adenoma in a total of 75,253 individuals screened.[15] After a median follow-up of 11.8 years, no difference in CRC incidence between the intervention and control groups was observed. The disease-specific mortality rate ratio associated with screening was 0.87 (0.78–0.97; P = .01). The rate ratio for death from all causes was 1.00 (0.98–1.02; P = .79).[16] When the median follow-up was extended to 19.5 years, there was a 9% reduction in CRC mortality (RR, 0.91; 95% CI, 0.84–0.98) but no reduction in CRC incidence (RR, 0.97; 95% CI, 0.91–1.03), or death from all causes (RR, 1.00; 95% CI, 0.99–1.02).[17]

The Danish trial in Funen, Denmark, entered approximately 31,000 individuals into two arms, in which individuals in the screened arm were offered nonrehydrated gFOBT testing every 2 years for nine rounds over a 17-year period. Sixty-seven percent of participants completed the first screen, and more than 90% of individuals invited to each subsequent screen underwent FOBT testing. This trial demonstrated an 18% reduction in CRC mortality at 10 years of follow-up,[18] 15% at 13 years of follow-up (RR, 0.85; 95% CI, 0.73–1.00),[19] and 11% at 17 years of follow-up (RR, 0.89; 95% CI, 0.78–1.01).[20] CRC incidence and overall mortality were virtually identical in both arms.

The Swedish trial in Goteborg enrolled all 68,308 citizens in the city who were born between 1918 and 1931 and were aged 60 to 64 years, and randomly assigned them to screening and control groups of nearly equal size. Participants in the control group were not contacted and were unaware they were part of the trial. Screening was offered at different frequencies to three different cohorts according to year of birth. Screening was done using the gFOBT Hemoccult-II test after dietary restriction. Nearly 92% of tests were rehydrated. Individuals with a positive test result were invited to an examination consisting of a case history, FS, and double-contrast barium enema. Follow-up ranged from 6 years 7 months to 19 years 5 months, depending on the date of enrollment. The primary end point was CRC-specific mortality. The overall screening compliance rate was 70%, and 47.2% of participants completed all screenings. Of the 2,180 participants with a positive test, 1,890 (86.7%) underwent a complete diagnostic evaluation with 104 cancers and 305 adenomas of at least 10 mm detected. In total, there were 721 CRCs (152 Dukes D, 184 Dukes C) in the screening group and 754 CRCs (161 Dukes D, 221 Dukes C) in the control group, with an incidence ratio of 0.96 (95% CI, 0.86–1.06). Deaths from CRC were 252 in the screening group and 300 in the control group, with a mortality ratio of 0.84 (95% CI, 0.71–0.99). This CRC mortality difference emerged after 9 years of follow-up. Deaths from all causes were very similar in the two groups, with a mortality ratio of 1.02 (95% CI, 0.99–1.06).[5]

#### Stage distribution

All trials have shown a more favorable stage distribution in the screened population than in controls (see Table 2). Data from the Danish trial indicated that while the cumulative incidence of CRC was similar in the screened and control groups, a higher percentage of CRCs and adenomas were Dukes A and Dukes B lesions in the screened group.[18] A meta-analysis of all previously reported randomized trials using biennial FOBT showed no overall mortality reduction by gFOBT screening (RR, 1.002; 95% CI, 0.989–1.085). The RR of CRC death in the gFOBT arm was 0.87 (95% CI, 0.8–0.95), and the RR of non–CRC death in the gFOBT group was 1.02 (95% CI, 1.00–1.04; P = .015).[21]

#### Mathematical modeling

Mathematical models have been constructed to extrapolate the results of screening trials and screening programs for benefit of the general population in community health care delivery settings. These models project that using currently available screening methodology can reduce CRC mortality or increase life expectancy.[22]

Table 2. Randomized Controlled Screening Trials to Assess Outcome: Guaiac-Based Fecal Occult Blood Testing

Site | Population Size | Positivity Rate (%) | % Cancers Localized^a^ | | Testing Interval | CRC Mortality Relative Risk (95% CI) | CRC Incidence RR (95% CI)
| | | Screened | Control
Minnesota [9,23] | 48,000 | Unrehydrated: 2.4% | 59 | 53 | Annual | 0.67 (0.51–0.83) | 0.80 (0.70–0.90)
Minnesota [9,23] | | Rehydrated: 9.8% | | | Biennial | 0.79 (0.62–0.97) | 0.83 (0.73–0.94)
United Kingdom [14] | 150,000 | Unrehydrated: 2.1% | 52 | 44 | Biennial | 0.85 (0.74–0.98) | 1.04 (0.95–1.14)
Denmark [18] | 62,000 | Unrehydrated: 1.0% | 56 | 48 | Biennial | 0.82 (0.68–0.99) | 1.00 (0.87–1.13)
Sweden [24] | 68,308 | Unrehydrated: 1.9% | 52 | 50 | Varied | 0.84 (0.71–0.99) | 0.96 (0.86–1.06)
Sweden [24] | | Rehydrated: 5.8%

CI = confidence interval; CRC = colorectal cancer; RR = risk ratio.

^a^% Localized = T1–3 N0 M0.

### Immunochemical FOBTs (iFOBT or FIT): Nonrandomized Controlled Trial Evidence to Assess Lesion Detection

The immunochemical FOBT (iFOBT or FIT) was developed to detect intact human hemoglobin. The advantage of FIT over gFOBT is that it does not detect hemoglobin from nonhuman dietary sources. Also, FIT does not detect partly digested human hemoglobin that comes from the upper respiratory or GI tract. Preliminary studies of several commercially developed FIT tests define their sensitivity and specificity compared with concurrently performed colonoscopy. The studies also examine these outcomes for different cutpoints, and the benefit of multiple versus single stool samples.[25,26]

Overall, FIT testing is much more sensitive than gFOBT, and it is more sensitive for cancers than for benign neoplasias. As expected, higher cutpoints decrease sensitivity and increase specificity. Fecal immunochemical tests may vary with regard to numbers of stools tested and cutoff values for a positive result.[26]

A systematic review of FIT studies in 2019 found 31 studies, with 120,255 participants and 18 types of FIT tests, that used screening colonoscopy as the reference standard, thus allowing calculation of test sensitivity and specificity.[27] Performance depended on the threshold for a positive result, so that a threshold of 10 µg/g (micrograms of hemoglobin per gram of feces) resulted in a CRC sensitivity of 0.91 (95% CI, 0.84–0.95) and a specificity of 0.90 (95% CI, 0.86–0.93), while a threshold greater than 20 µg/g resulted in a sensitivity of 0.71 (95% CI, 0.56–0.83) with specificity of 0.95 (95% CI, 0.94–0.96). For advanced adenomas, at a threshold of 10 µg/g, sensitivity was 0.40 (95% CI, 0.33–0.47) with a specificity of 0.90 (95% CI, 0.87–0.93). Comparison of three FITs at three thresholds was inconclusive because CIs overlapped, and the comparisons were across rather than within studies. Overall, FIT appears to provide a substantially improved sensitivity compared with gFOBT, although with some compromise in specificity.

The diagnostic sensitivity of FIT testing may vary depending on lesion location in the colon. Proximal lesions may be harder to detect for several reasons, including that they may arise from serrated lesions that are flat and, because they are less vascular than traditional adenomas, tend to bleed less frequently. In a population-based screening program of every-other-year FIT (set to detect 100 ng of hemoglobin per mL of buffer) testing, individuals who had six FITs over time were assessed to learn the frequency with which proximal and distal lesions were discovered.[28] Over 12 years (2002–2014), 123,000 participants had 441,000 FITs. The detection rate for proximal colon cancer declined only from the first to the second screening round (0.63–0.36 per 1,000 screened participants), while the rate for both distal colon and rectal cancer decreased across all six rounds (distal cancer, 1.65 in the first round to 0.17 in the sixth round). (Similar trends occurred for advanced adenomas.) The proportional interval cancer rate—the number of cancers observed versus expected—was higher in the proximal colon than in the distal colon (25.2% vs. 6.0%), suggesting that many proximal cancers (or their immediate precursors) may have been missed by FIT. These results suggest that FIT is less sensitive for proximal CRC and certainly for advanced adenomas, although it is possible that the miss rate may have been inflated if colonoscopy done in response to a positive FIT had missed a precursor lesion. Overall, these results raise questions about the degree of efficacy of FIT in preventing proximal CRC mortality.

The performance and acceptability of FIT over time was assessed by Kaiser-Permanente of Northern and Southern California in a screening program. A retrospective cohort of 323,349 persons aged 50 to 70 years was followed for up to four screening rounds over 4 years. Of patients invited, participation in round one was 48.2%, and of those remaining eligible, 75.3% to 86.1% participated in subsequent rounds. The authors reported that “programmatic FIT screening detected 80.4% of patients with CRC diagnosed within 1 year of testing, including 84.5% in round one and 73.4% to 78.0% in subsequent rounds.” An important observation was the degree of participation found. One limitation of the study is that it was not clear how work-up bias was addressed; e.g., when individuals with a positive test result are preferentially worked up to ascertain the presence or absence of CRC, while individuals with a negative test, but who might have CRC, are not. Although a look-back method was used to ascertain whether an individual had cancer, it is not clear that the duration of follow-up was long enough to discover everyone who should have been included in the denominator of the sensitivity calculation. Nevertheless, the results suggested that subsequent FIT results were at least partially independent of previous results. Longer follow-up may help clarify this issue. Mortality reduction could not be assessed in this study.[29]

Potential false-positive test results because of an increased risk of upper GI bleeding are of concern with FOBT testing and pretest protocols, therefore; low-dose aspirin regimens are discontinued for a week or more before FOBT. The performance of FIT was tested in an ongoing diagnostic study (2005–2009) at 20 internal medicine GI practices in southern Germany. Nineteen hundred seventy-nine patients (233 regular low-dose aspirin users and 1,746 never users) were identified in the records for inclusion in the analysis. All patients provided one stool sample taken within a week before colonoscopy preparation, which was collected according to instructions in a container that was kept refrigerated or frozen until rendered to the clinic on the day of colonoscopy, and the patients agreed to complete a standard questionnaire regarding the use of analgesics and low-dose aspirin (for prevention of cardiovascular disease). Stool samples were thawed within a median of 4 days after arrival at the central laboratory (shipped frozen from the recipient clinics). Fecal occult blood levels were measured by two automated FIT tests according to the manufacturer’s instructions (RIDASCREEN Haemoglobin and RIDASCREEN Haemo-/Haptoglobin Complex, r-biopharm, Bensheim, Germany) following clinical procedures and blinded to colonoscopy results. Advanced neoplasms were found in 24 aspirin users (10.3%) and in 181 nonusers (10.4%). At the cut point recommended by the manufacturer, sensitivities for the two tests were as follows: 70.8% (95% CI, 48.9%–87.4%) for users compared with 35.9% (95% CI, 28.9%–43.4%) for nonusers for the Haemoglobin test (P = .001) and 58.3% (95% CI, 36.6%–77.9%) for users compared with 32% (95% CI, 25.3%–39.4%) for nonusers for the Haemo-/Haptoglobin test (P = .01). Specificities were as follows: 85.7% (95% CI, 80.2%–90.1%) for users compared with 89.2% (95% CI, 87.6%–90.7%) for nonusers for the Haemoglobin test (P = .13) and 85.7% (95% CI, 80.2%–90.1%) for users compared with 91.1% (95% CI, 89.5%–92.4%) for nonusers for the Haemo-/Haptoglobin test (P = .01). For these FITs, sensitivity for advanced neoplasms was notably higher with the use of low-dose aspirin while specificity was only slightly reduced, suggesting that there might be an advantage of aspirin use to increase sensitivity without much decrease in specificity.[30]

### Sigmoidoscopy

The flexible fiberoptic sigmoidoscope was introduced in 1969. The 60 cm flexible sigmoidoscope became available in 1976.[31] The flexible sigmoidoscope permits a more complete examination of the distal colon with more acceptable patient tolerance than the older rigid sigmoidoscope. The rigid instrument can discover 25% of polyps, while the 60-cm scope can find as many as 65% of them. The finding of an adenoma by FS may warrant a colonoscopy to evaluate the more proximal portion of the colon.[32,33] The prevalence of advanced proximal neoplasia is increased in patients with a villous or tubulovillous adenoma distally and is also increased in those aged 65 years or older with a positive family history of CRC and with multiple distal adenomas.[34] Most of these adenomas are polypoid, flat, and depressed lesions, which may be somewhat more prevalent than previously recognized.[35]

Four major sigmoidoscopy screening RCTs have reported incidence and mortality results (a fifth, the Telemark trial in Norway, was very small, with 800 total participants). These are the Norwegian Colorectal Cancer Prevention (NORCCAP) trial; the United Kingdom Flexible Sigmoidoscopy Screening Trial (UKFSST); the Screening for COlon REctum (SCORE) trial in Italy; and the U.S. Prostate, Lung, Colorectal, and Ovarian (PLCO) Cancer Screening Trial (see Table 3). Participants were aged 55 to 74 years in PLCO and aged 55 to 64 years in the other three trials. Together, the trials enrolled 166,000 participants in the screened groups and 250,000 participants in the control groups. Median follow-up was approximately 11 years for each group. Results were summarized in three systematic reviews. There was an 18% relative reduction in CRC incidence (RR, 0.82; 95% CI, 0.75–0.89), an overall 28% relative reduction in CRC mortality (RR, 0.72; 95% CI, 0.65–0.80), a 31% relative reduction in the incidence of distal CRC (RR, 0.69; 95% CI, 0.63–0.74), and a 46% relative reduction in the mortality of distal CRC (RR, 0.54; 95% CI, 0.43–0.67).[36] A meta-analysis showed a statistically significant, although clinically small, effect on all-cause mortality (RR, 0.97; 95% CI, 0.96–0.99).[37]

Three of the four trials above published long-term follow-up analyses of trial results. For UKFSST, median follow-up was 17.1 years. The RRs for CRC incidence and mortality were similar to those originally reported: an RR of 0.70 (95% CI, 0.62–0.79) for CRC mortality and an RR of 0.74 (95% CI, 0.70–0.80) for CRC incidence. For the PLCO trial, median follow-up was 15.8 years for incidence and 16.8 years for mortality; RRs were 0.75 (95% CI, 0.66–0.85) for CRC mortality and 0.82 (95% CI, 0.76–0.88) for CRC incidence. Median follow-up in the NORCCAP trial was approximately 15 years; HRs were 0.79 (95% CI, 0.65–0.96) for CRC mortality and 0.78 (95% CI, 0.70–0.87) for CRC incidence.[38,39] A pooled analysis of the four trials, using data through 15 years of follow-up and restricted to those aged 55 to 64 years at randomization, showed a rate ratio of 0.79 (95% CI, 0.75–0.83) for CRC incidence and 0.80 (95% CI, 0.72–0.88) for CRC mortality.[40]

There are no strong direct data from studies of sigmoidoscopy to determine the optimal frequency of screening tests in programs of screening.

Table 3. Randomized Controlled Screening Trials to Assess Outcome: Sigmoidoscopy^a^

Site | Population Size (Intervention) | FS Rate (%)^b^ | Colonoscopy Rate (%)^c^ | Cumulative CRC Incidence (%) | CRC Deaths per 100,000 Person-Years | CRC Mortality Relative Risk (95% CI) | Distal CRC Mortality Relative Risk (95% CI)^e^ | CRC Incidence Relative Risk (95% CI)
United Kingdom 2010 | Intervention: 57,099 | 71.1 | 5.0 | 1.5 | Intervention: 30 | 0.69 (0.59–0.80) | 0.58 (0.46–0.74) | 0.77 (0.70–0.84)
United Kingdom 2010 | Control: 112,939 | 71.1 | 5.0 | 1.5 | Control: 44 | 0.69 (0.59–0.80) | 0.58 (0.46–0.74) | 0.77 (0.70–0.84)
Italy 2011 | Intervention: 17,136 | 57.8 | 7.8 | 1.6 | Intervention: 35 | 0.78 (0.56–1.08) | 0.73 (0.47–1.12) | 0.82 (0.69–0.96)
Italy 2011 | Control: 17,136 | 57.8 | 7.8 | 1.6 | Control: 44 | 0.78 (0.56–1.08) | 0.73 (0.47–1.12) | 0.82 (0.69–0.96)
United States 2012 | Intervention: 77,445 | 86.6 | 25.3 | 1.5 | Intervention: 29 | 0.74 (0.63–0.87) | 0.50 (0.38–0.64) | 0.79 (0.72–0.85)
United States 2012 | Control: 77,455 | 86.6 | 25.3 | 1.5 | Control: 39 | 0.74 (0.63–0.87) | 0.50 (0.38–0.64) | 0.79 (0.72–0.85)
Norway 2014 | Intervention: 20,572^d^ | 63.0 | 19.5 | 1.4 | Intervention: 31 | 0.73 (0.56–0.94) | 0.87 (0.61–0.043) | 0.80 (0.70–0.92)
Norway 2014 | Control: 78,220 | 63.0 | 19.5 | 1.4 | Control: 43 | 0.73 (0.56–0.94) | 0.87 (0.61–0.043) | 0.80 (0.70–0.92)

CI = confidence interval; CRC = colorectal cancer; FS = flexible sigmoidoscopy.

^a^Adapted from Lin et al.[26]

^b^The FS rate refers to the % of individuals who received FSG in the screened group.

^c^The colonoscopy rate refers to the % of individuals who received a colonoscopy as a follow-up to a positive sigmoidoscopy among those who received a sigmoidoscopy. In the U.S. study, individuals with a polyp found at the time of a sigmoidoscopy were referred for diagnostic follow-up, which was generally done with a colonoscopy. In the other studies, the referral criteria for a colonoscopy depended on the histology of lesion(s) found at the time of the sigmoidoscopy.

^d^ Half of the intervention group was also offered FOBT.

^e^These data are from Lin et al.[26], eFigure 1. Forest plot of randomized controlled trials of FS screening on distal CRC mortality.

### Combination of FOBT and Flexible Sigmoidoscopy: Impact on Neoplasm Detection

A combination of FOBT and sigmoidoscopy might increase the detection of lesions in the left colon (compared with sigmoidoscopy alone) while also increasing the detection of lesions in the right colon. Sigmoidoscopy detects lesions in the left colon directly but detects lesions in the right colon only indirectly when a positive sigmoidoscopy (that may variously be defined as a finding of advanced adenoma, any adenoma, or any polyp) is used to trigger a colonoscopic examination of the whole colon.

In 2,885 veterans (97% male; mean age, 63 years), the prevalence of advanced adenoma at colonoscopy was 10.6%. It was estimated that combined screening with one-time FOBT and sigmoidoscopy would detect 75.8% (95% CI, 71.0%–80.6%) of advanced neoplasms. Examination of the rectum and sigmoid colon during colonoscopy was defined as a surrogate for sigmoidoscopy. This represented a small but statistically insignificant increase in the rate of detection of advanced neoplasia when compared with FS alone (70.3%; 95% CI, 65.2%–75.4%). The latter result could be achieved assuming that all patients with an adenoma in the distal colon undergo complete colonoscopy. Advanced neoplasia was defined as a lesion measuring at least 10 mm in diameter, containing 25% or more villous histology, high-grade dysplasia, or invasive cancer.[41] One-time use of FOBT differs from the annual or biennial application reported in those studies summarized in Table 2.

A study of 21,794 asymptomatic individuals (72% were men) who had both colonoscopy and FIT for occult blood compared the detection of proximal cancers as triggered by different test results. FIT alone resulted in a sensitivity of 58.3% and a specificity of 94.5% for proximal cancer diagnosis. FIT plus the finding of advanced neoplasia in the rectosigmoid colon yielded a sensitivity of 62.5% and a specificity of 93%. In this study, the addition of sigmoidoscopy to FIT did not substantially improve the detection of proximal colon cancers, compared with FIT alone.[42]

### Colonoscopy

#### Randomized controlled trial evidence about colorectal cancer incidence or mortality reduction

Five RCTs exploring the impact of colonoscopy on CRC mortality or incidence have been initiated (NCT01239082 (https://www.cancer.gov/clinicaltrials/NCT01239082), NCT00883792 (https://www.cancer.gov/clinicaltrials/NCT00883792), NCT00906997 (https://www.cancer.gov/clinicaltrials/NCT00906997), NCT02078804 (https://www.cancer.gov/clinicaltrials/NCT02078804), and ChiCTR1900025257 (https://www.chictr.org.cn/showprojEN.html?proj=42159)). Results of one RCT have been reported.

The NordICC trial (NCT00883792 (https://www.cancer.gov/clinicaltrials/NCT00883792)) was a pragmatic randomized trial of colonoscopy screening, begun in 2009 in Poland, Norway, Sweden, and the Netherlands. Men and women aged 55 to 64 years were identified from population registries and randomly assigned in a 1:2 ratio to receive either an invitation to undergo a single colonoscopy screening (invited group) or no invitation to screening (usual care group). Individuals were randomly assigned before they were asked whether they wanted to participate in the trial. Except for the 6,900 participants from Norway, participants in the usual-care group were not informed of their enrollment in the trial. The primary end points were risk of developing CRC and CRC-related death. The secondary end point was death from any cause.

Data were reported for 84,585 participants in Poland, Norway, and Sweden: 28,220 in the invited group, of whom 42% underwent screening, and 56,365 in the usual-care group. Opportunistic colonoscopy screening activity was monitored in the trial regions, and no additional colonoscopy procedures were identified beyond what would have been expected for clinical indications, indicating minimal, if any, contamination in the usual-care group. Hence, this trial compared colonoscopy screening with no screening. After a median follow-up of 10 years, in intention-to-screen analyses, the risk of developing CRC was 0.98% in the invited group and 1.20% in the usual-care group (risk ratio, 0.82; 95% CI, 0.70–0.93). The risk of death from CRC was 0.28% in the invited group and 0.31% in the usual-care group (risk ratio, 0.90; 95% CI, 0.64–1.16). The risk of death from any cause was 11.03% in the invited group and 11.04% in the usual-care group (risk ratio, 0.99; 95% CI, 0.96–1.04). Since only 42% of invited participants underwent screening, adjusted analyses were performed to estimate the effect of screening if all participants randomly assigned to screening actually had been screened. The risk ratio for CRC was 0.69 (95% CI, 0.55–0.83), and the risk ratio for CRC-related death was 0.50 (95% CI, 0.27–0.77). Fifteen participants had major bleeding after polyp removal, and there were no perforations or screening-related deaths within 30 days after colonoscopy.[43]

Caveats for this trial include the following:

1. Data from the Netherlands, roughly 10% of the participants, were not included.
2. Only 42% of invited participants underwent screening.
3. Follow-up duration may not be long enough to realize the full effect of the screening; additional analyses after 15 years are anticipated.
4. Colonoscopy is operator dependent, and 29% of the trial endoscopists had an adenoma detection rate (ADR) below the recommended minimum threshold.
5. There is a suggestion that high-risk individuals in Poland chose to undergo colonoscopy, which could have led to an underestimation of the screening effect.[44]

Indirect evidence of benefit comes from the detection rate of lesions that may be clinically important (like early CRC or advanced adenomas). Some case-control results are available. The sensitivity of a CRC screening test for adenomas (and for CRC) may be helpful in considering its possible clinical usefulness, given that there are no completed RCTs of the impact of colonoscopy on CRC mortality or incidence. Colonoscopy is commonly considered the gold standard because it directly assesses the physical presence of lesions in the colon. However, colonoscopy can miss roughly 10% of cancers and advanced adenomas because of suboptimal bowel cleansing, lesions being hidden behind folds (or haustra) in the colon, or suboptimal examination by the endoscopist. Recent data suggest that the magnitude of an endoscopist's adenoma-detection rate (commonly measured as the proportion of colonoscopies in which an adenoma is found) is related to reduced incidence of CRC.

#### Adenoma detection rate (ADR)

Detection rates in colonoscopy screening vary with the rate at which the endoscopist examines the colon while withdrawing the scope. In one study, there were differences among gastroenterologists in the rates of detection of adenomas (range of the mean number of lesions per patient screened, 0.10–1.05; range of the percentage of patients with adenomas, 9.4%–23.7%) and the times of withdrawal of the scope (3.1–16.8 minutes for procedures not including polyp removal). Examiners whose mean withdrawal time was 6 minutes or more had higher detection rates than those with mean withdrawal times of less than 6 minutes (28.3% vs. 11.8%; P < .001 for any neoplasia and 6.4% vs. 2.6%; P < .005 for advanced neoplasia).[45]

In the first 10 years of the German CRC screening program, detection of nonadvanced adenomas increased in men from 13.3% to 22.3% and in women from 8.4% to 14.9%. Most of the nonadvanced adenomas, however, were small (<0.5 cm) and had uncertain clinical significance. The detection of advanced adenomas and CRC increased by a much smaller amount.[46]

Overall detection rates of adenomas and cancer may be affected by how thoroughly endoscopists search for flat adenomas and flat cancer. While the phenomenon of flat neoplasms has been appreciated for years in Japan, it has more recently been described in the United States. In a study in which endoscopists used high-resolution white-light endoscopes, flat or nonpolypoid lesions accounted for only 11% of all superficial colon lesions, but these flat or nonpolypoid lesions were about 9.8 times as likely as polypoid lesions to contain cancer (in situ neoplasia or invasive cancer).[35] However, because the definition of flat or nonpolypoid was height less than one-half of the diameter, it is likely that many lesions classified as nonpolypoid in this study would be routinely found and described by U.S. endoscopists as sessile. The existence of very flat or depressed lesions—depressed lesions are very uncommon but highly likely to contain cancer—requires that endoscopists pay more attention to this problem.[47] Flat lesions may play a role in the phenomenon of missed cancers.[48]

A health maintenance organization assessed the impact of ADRs in follow-up after 314,872 colonoscopies performed from 1998 to 2010 by 136 gastroenterologists, each of whom had done at least 300 colonoscopies during that period. The goal was to determine rates of interval CRC, interval advanced CRC, and CRC death and to relate those rates to a gastroenterologist’s ADR. There were 712 interval cancers (155 advanced) and 147 CRC deaths. The risk of interval cancer from lowest-to-highest quintile of ADR was 9.8, 8.6, 8.0, 7.0, and 4.8 per 10,000 person-years of follow-up. The adjusted hazard ratio (HR) for physicians in the highest quintile compared with those in the lowest quintile was 0.52 for any interval CRC, 0.43 for advanced CRC, and 0.38 for fatal CRC. Each 1.0% increase in ADR was associated with a 3% decrease in risk of cancer, although the CI for each quintile was broad. Limitations of the study include the inability to determine which specific feature of ADR led to reduced interval cancer. For example, it is unclear whether it was due to the following:

- Removal of small adenomas that may grow rapidly to become CRC.
- ADR being a surrogate outcome for an endoscopist’s ability to remove adenomas more completely.
- ADR being a surrogate outcome for an endoscopist’s ability to better detect large, flat, serrated lesions.
- Higher ADR leading to recommendations for more frequent postpolypectomy surveillance colonoscopy.

Another limitation is that the harms of a colonoscopy associated with ADR could not be measured.[49]

#### Nonrandomized controlled trial evidence about colorectal cancer incidence or mortality reduction

Although there is little RCT evidence to assess reduction of CRC incidence or mortality by colonoscopy, some case-control evidence is available.[50] Based on case-control data about sigmoidoscopy, noted above, there was speculation that protection for the right colon might be similar to that for the left colon. A 2009 case-control study of colonoscopy raised questions about whether the impact of colonoscopy on proximal lesions might be different than the impact on distal lesions.[51] Using a province-wide administrative database in Ontario, Canada, investigators compared cases of individuals who were diagnosed with CRC from 1996 to 2001 and had died by 2003. Controls were selected from persons who did not die of CRC. Billing claims were used to assess exposure to previous colonoscopy. The OR for the association between complete colonoscopy and distal lesions was 0.33, suggesting a substantial mortality reduction. For proximal lesions, however, the OR of 0.99 indicated virtually no mortality reduction. However, this study had limited data about whether examinations were complete to the cecum and about bowel prep. Further, many endoscopists were not gastroenterologists.

A case-control study assessed CRC reduction (but not CRC mortality reduction) in the right side versus the left side of the colon. In a population-based study from Germany using data from administrative and medical records, 1,688 patients with CRC were compared with 1,932 participants without CRC, aged 50 years or older.[52] Data were collected about demographics, risk factors, and previous screening examinations. According to colonoscopy records, the cecum was reached 91% of the time. Colonoscopy in the previous 10 years was associated with an OR for any CRC of 0.23, for proximal CRC of 0.44, and for distal CRC of 0.16. While this study did not assess CRC mortality, the results suggested that the magnitude of the right-side versus the left-side difference may be smaller than previously found.[51] It would be extremely useful to assess right-side versus left-side differences in a RCT.

Other case-control data suggest a reduction of CRC incidence on the right side of about 64% compared with about 74% on the left side.[53]

Because there is little RCT evidence and case-control evidence is limited, it is important to consider the degree of mortality reduction from colonoscopy. While a figure of 90% is sometimes cited as the degree of mortality reduction,[54] the question will not be properly answered until the completion of European RCT that has a control group of routine care that involves minimal screening of any kind.[55] Reliable results from colonoscopy RCTs are needed to confirm the studies of FS that suggest a mortality reduction of approximately 50% might occur in the right colon, similar to the demonstrated impact of FS in the left colon. This generalization is limited by a number of factors, including that proximal lesions may have a different pathology (e.g., a serrated appearance and different molecular pathway).

The benefit of continued CRC screening after age 75 years is uncertain. An observational cohort study with the Harvard Nurses’ Health Study (NHS) and Health Professionals Follow-Up Study (HPFS) sought to determine whether CRC mortality or morbidity was affected by lower endoscopy (colonoscopy or sigmoidoscopy) screening in individuals older than 75 years, based on a person’s age, comorbidity, family history of CRC, and screening history. Individuals were followed from 1988 to 2016 and had follow-up questionnaires every 2 years, with a 90% response rate. Among over 50,000 individuals, there were 661 CRCs and 323 CRC-related deaths. Screening after age 75 years was associated with reduced CRC incidence (HR, 0.61; 95% CI, 0.51–0.74) and CRC-related mortality (HR, 0.60; 95% CI, 0.46–0.78), regardless of screening history. It is not clear exactly what past screening history meant, however—i.e., the number and results of exams before age 75 years (no polyps; or some polyps indicating increased future risk). The study also assessed the relation of comorbidity to benefit and found that individuals with serious comorbidity—defined as myocardial infarction, stroke, or three comorbidities (high blood pressure, diabetes, and hypercholesterolemia)—did not benefit from screening. Although observational and not an RCT, this study likely provides the best-available data for a scenario in which a formal RCT is unlikely to be performed. It suggests that healthy people older than 75 years may benefit from continued CRC screening and reduction in mortality and morbidity.[56]

### Virtual Colonoscopy (Computed Tomographic Colonography [CTC])

Virtual colonoscopy (also known as CTC or CT pneumocolon) refers to the examination of computer-generated images of the colon constructed from data obtained from an abdominal CT scan. These images simulate the effect of a conventional colonoscopy. Patients must take laxatives to clean the colon before the procedure, and the colon is insufflated with air (sometimes carbon dioxide) by insertion of a rectal tube just before radiographic examination.[57]

The American College of Radiology Imaging Network group conducted a large, paired-design study, with 2,531 participants at average risk (prevalence of polyps or cancer ≥10 mm, 4%; mean age, about 58 years) screened with both CTC and optical colonoscopy (OC). The gold standard was the OC, including repeat OC exams for people with lesions found by CTC but not by OC. Of 109 people with at least one adenoma or cancer 10 mm or larger, 98 (90%) were detected by CTC (referring everyone with a CTC lesion of ≥5 mm). Specificity was 86%, and PPV was 23%. This study raises several concerns, including the following:

- Most, but not all, lesions found by CTC and not by OC were followed up with repeat OC.
- The design did not allow for following patients, thus potentially missing lesions that grow rapidly and would only be seen after follow-up.
- Because the centers conducting the screening were primarily academic centers and the radiologists and endoscopists were carefully trained, the generalizability of the findings is not clear.
- Sixteen percent of participants had an extracolonic finding that required further evaluation.

Unknowns from the study include the following for either OC or CTC:[58]

- The number of detected polyps that would have progressed to invasive cancer.
- The number of people harmed by the screening process.

Another study reported similar sensitivity and specificity in individuals with an increased risk of CRC.[59] In this study, the sensitivity of OC could not be determined because it was done in an unblinded manner. This cross-sectional study suggested that virtual colonoscopy might be an acceptable screening or surveillance test for individuals at high risk of CRC, but it did not address outcome or frequency of testing in those at high risk.

Some studies have assessed how well virtual colonoscopy can detect colorectal polyps without a laxative prep. The question is of great importance for implementation because the laxative prep required by both conventional colonoscopy and virtual colonoscopy is considered a great disadvantage by patients. By tagging feces with iodinated contrast material ingested for several days before the procedure, investigators in one study were able to detect lesions larger than 8 mm with 95% sensitivity and 92% specificity.[60] The particular tagging material used in this study caused about 10% of patients to become nauseated; however, other materials are being assessed.

Another study [61] used a low-fiber diet, orally ingested contrast, and "electronic cleansing," a process that subtracts tagged feces. CTC identified 91% of adenomas 10 mm or larger, but it detected fewer (70%) lesions of at least 8 mm. Patients who received both CTC and OC preferred CTC to OC (290 vs. 175). This study shows that CTC without a laxative prep detects small 1-cm lesions with high sensitivity and is acceptable to patients. Long-term utilization of CTC will depend on several issues, including the frequency of follow-up exams that would be needed to detect smaller lesions that were undetected and may grow over time.

Extracolonic abnormalities are commonly detected with CTC. Fifteen percent of patients in an Australian series of 100 patients, referred for colonography because of symptoms or family history, were found to have extracolonic findings, and 11% of the patients needed further medical workups for renal, splenic, uterine, liver, and gallbladder abnormalities.[62] In another study, 59% of 111 symptomatic patients referred for clinical colonoscopy in a Swedish hospital between June 1998 and September 1999 were found to have moderate or major extracolonic conditions on CTC. CTC was performed immediately before a colonoscopy, and these findings required further evaluation. The extent to which follow-up of these incidental findings benefited patients is unknown.[63]

Sixty-nine percent of 681 asymptomatic patients in Minnesota had extracolonic findings, 10% of which were deemed highly important by the investigators; these patients required further medical workup. Suspected abnormalities involved kidney (34), chest (22), liver (8), ovary (6), renal or splenic arteries (4), retroperitoneum (3), and pancreas (1);[64] however, the extent to which these findings contribute to benefits or harms is uncertain. Two other studies, one large (N = 2,195) and one small (n = 136) examined the moderate or high importance of extracolonic findings from CTC. The larger study [65] found that 8.6% of patients had an extracolonic finding of at least moderate importance, while 24% of patients in the smaller study [66] required some evaluation for an extracolonic finding. The larger study found nine cancers from these evaluations, at a partial cost (they did not include all costs) of $98.56 per patient initially screened. The smaller study found no important lesions from evaluation, at a cost of $248 per person screened. Both of these estimates of cost are higher than previous studies have found. The extent to which any patients benefited from the detection of extracolonic findings is not clear. Because both studies were conducted in academic medical centers, the generalizability to other settings is also not clear. Neither of these studies examined the effect of extracolonic findings on patient anxiety and psychological function.

Technical improvements involving both the interpretation methodology, such as three-dimensional (3-D) imaging, and bowel preparation are under study in many centers. While specificity for detection of polyps is homogeneously high in many studies, sensitivity can vary widely. These variations are attributable to a number of factors including characteristics of the CT scanner and detector, width of collimation, mode of imaging (two dimensional [2-D] vs. 3-D and/or fly-through), and variability in the expertise of radiologists.[67]

### Digital Rectal Examination

A case-control study reported that routine digital rectal examination was not associated with any statistically significant reduction in mortality from distal rectal cancer.[68]

### Detection of DNA Mutations in the Stool

The molecular genetic changes that are associated with the development of colorectal adenomas and carcinoma have been well characterized.[69] Advanced techniques have been developed to detect several of these gene mutations that shed into the stool.[70-73] Stool DNA testing was recently assessed in a prospective study of asymptomatic individuals who received colonoscopy, three-card FOBT (Hemoccult II), and stool DNA testing based on a panel of markers assessing 21 mutations. Conducted in a blinded way with prestated hypotheses and analyses, the study found that among 4,404 patients, the DNA panel had a sensitivity for CRC of 51.6% (for all stages of CRC) versus 12.9% for Hemoccult II, while the false-positive rates were 5.6% and 4.8%, respectively.[74,75]

A next-generation multitargeted stool test combined methylation markers for NDRG4 and BMP3, several KRAS mutations, and a human hemoglobin immunoassay. The markers, each quantitated separately, were combined using an algorithm in a prespecified multivariable analysis. In the DeeP-C trial, the assay’s sensitivity and specificity were compared with a commercial FIT test (OC FIT-CHEK Polymedco), using colonoscopy as the gold standard. Among 12,776 participants aged 50 to 84 years (weighted toward >65 years) who underwent colonoscopy screening and were enrolled at 90 sites across the United States and Canada between 2011 and 2012, 9,989 had fully evaluable results. There were 65 CRC and 757 advanced adenomas or sessile serrated polyps 1 cm or greater. The sensitivity for CRC was 92.3% (60 of 65 CRC) for the multitargeted test and 73.8% for FIT. Sensitivity for advanced lesions was 42.4% for the multitargeted test and 23.8% for FIT. Sensitivity for high-grade dysplasia was 69.2% for the multitarget test and 46.2% for FIT. Sensitivity for serrated sessile polyps 1 cm or greater was 42.4% for the multitargeted test and 5.1% for FIT. Specificities were 86.6% for the multitargeted test and 94.9% for FIT, using nonadvanced or negative colonoscopy results, and were 89.8% and 96.4% for totally negative colonoscopy results. A receiver operating characteristic (ROC) analysis showed that the multitargeted test has higher sensitivity than FIT alone, even when the FIT cutoff is reduced to try to increase sensitivity. A limitation is that there were no data about performance of repeated testing over time and what may be an appropriate testing interval.[76]

A newer version of the multitargeted stool DNA (mt-sDNA) test was recently developed. This test incorporates a novel molecular marker panel that includes methylated DNA markers of four genes—LASS4, LRRC4, PPP2R5C, and ZDHHC1—while retaining the fecal hemoglobin marker. In the BLUE-C trial, which was structured similarly to the DeeP-C trial, the investigators compared the sensitivity and specificity of the newer version of the mt-sDNA test with FIT (OC FIT-CHEK Polymedco), using colonoscopy as the gold standard for detecting stage I, II, and III CRC and advanced precancerous lesions in average-risk individuals older than 40 years.[77]

- Between November 2019 and January 2023, 20,176 participants were enrolled at 186 sites and underwent both colonoscopy and stool tests. The mean age was 63 years; 53% of participants were female, 60% were White individuals, 5.2% had a family history of CRC in a first-degree relative, and 13.4% had a positive next-generation mt-sDNA test. Among those enrolled, 0.5% (98/20,176) had CRC, and 10.6% (2,144/20,176) had advanced precancerous lesions. Among individuals with CRC, 84% (82/98) had stage I, II, or III CRC.
- The sensitivity for CRC was 93.9% (92/98) for the mt-sDNA test and 67.3% for FIT. According to the study, sensitivity did not vary substantially based on disease stage or location in the colon. The sensitivity for advanced precancerous lesions (large adenomas, large sessile serrated polyps, villous adenomas, or adenomas with high-grade dysplasia or carcinoma in situ) was 43.4% (931/2,144) for the mt-sDNA test and 23.3% for FIT. However, sensitivity rose to 74.6% (85/114) for the mt-sDNA test and to 47.4% for FIT when limited to lesions with high-grade dysplasia. Approximately 7% of participants had a false-positive test, defined as a positive stool DNA test but no adenomas, advanced precancerous lesions, or CRC were found by colonoscopy. Specificities were 92.7% for the mt-sDNA test and 95.7% for FIT, using nonadvanced or negative colonoscopy results, and 93.4% for the mt-sDNA test and 96.0% for FIT using negative colonoscopy results. The area under the ROC curve analysis also showed that the sensitivity for CRC and advanced neoplasia was greater for the mt-sDNA test compared with FIT alone.
- The study was limited by the high proportion of enrolled participants (20,176) whose samples could not be evaluated according to the protocol. This was due in part to the conduct of the study during the coronavirus disease pandemic.

Overall, the multitargeted test was more sensitive than FIT for both CRC and advanced precancerous lesions, but the test was less specific.[76,77]

### Cell-Free DNA (cfDNA) Blood Test

A cfDNA blood test was developed for the detection of CRC. This test analyzes plasma cfDNA to identify aberrant DNA-methylation status, abnormal DNA-fragmentation patterns, and the presence or absence of somatic pathogenic variants in the APC and KRAS genes. In the ECLIPSE trial, researchers conducted a prospective multicenter study at 265 primary care sites and endoscopy centers across the United States.[78] The trial aimed to evaluate the performance of the cfDNA blood-based test in detecting asymptomatic and early-stage CRC in a screening-relevant population.

- Between October 2019 and September 2022, 22,877 participants were enrolled in the study. Among those enrolled, 0.3% (65/22,877) had CRC, and 4.8% (1,116/22,877) had advanced precancerous lesions. The clinical validation cohort included 10,258 participants, 7,861 of whom met all inclusion and exclusion criteria, had complete colonoscopies, and had evaluable cfDNA blood-based tests. This final study cohort had a mean age of 60 years (range, 45–84 years); 54% were female, and 79% were White individuals. In this cohort, 11.4% had a positive cfDNA blood-based test.
- The sensitivity of the cfDNA blood-based test for CRC was 83.1% (54/65) for the participants with CRC detected by colonoscopy. This means that a total of 83.1% of these participants had a positive cfDNA test and 16.9% had a negative test. Sensitivity for stage I, II, or III CRC was 87.5% (42/48), and sensitivity for advanced precancerous lesions was 13.2% (147/1,116). The specificity was 89.6% using nonadvanced adenomas, non-neoplastic findings, and negative colonoscopy results.

Overall, the study team demonstrated the feasibility of using plasma cfDNA to screen for CRC. However, the relatively low sensitivity for detecting advanced precancerous lesions presents a limitation. Currently, the cfDNA blood-based test is still awaiting approval by the U.S. Food and Drug Administration and is not covered by Medicare.[78]

### Adherence to Screening

Benefit from CRC screening can only occur if eligible people are screened. There have been problems with screening adherence, particularly for low-income and uninsured people. There are also concerns that some people may be less likely to adhere to screening with a colonoscopy than with fecal tests. One well-conducted RCT found that, among an uninsured population, mailed FIT-kit outreach and follow-up reminder phone calls resulted in an adherence rate of 40.7%. Mailed colonoscopy invitations and follow-up phone reminders resulted in a 24.6% adherence rate. The usual-care adherence rate in this trial was 12.1%.[79]

### Tailoring Screening to Risk

Benefit of screening might be improved by tailoring the recommended screening test to a person’s degree of CRC risk. For example, if a subgroup of young women were to have a substantially lower risk of proximal neoplasms, then recommending sigmoidoscopy instead of colonoscopy might lead to higher compliance (the U.S. Preventive Services Task Force recommends both procedures without preference, as part of a program of screening those at average risk).

In a study to identify an average-risk group who had a higher versus lower risk of advanced neoplasia (CRC and advanced adenomas) anywhere in the colon, 2,993 individuals having a screening colonoscopy were stratified by age, sex, waist circumference, smoking, and family history (those in high-risk family categories, e.g., Lynch syndrome or adenomatous polyposis coli, were excluded). In a classification system derived in a training set, the risks of advanced neoplasm in four groups were: 1.92%, 4.88%, 9.93%, and 24%. In the two lowest-risk groups, sigmoidoscopy would have detected 51 (73%) of 70 advanced neoplasms. In the independent validation set, results were similar. Whether this system increases overall compliance has yet to be determined.[80]

A similar stratification system based on age, sex, smoking, and family history—and combined with FIT—was tested in Asia to determine whether use of the stratification system plus FIT could detect which people needed colonoscopy. If either the stratification system or FIT was positive, a person was recommended for colonoscopy. Using this strategy, 95% of those with CRC were correctly told to have colonoscopy.[81]

### References

Hewitson P, Glasziou P, Irwig L, et al.: Screening for colorectal cancer using the faecal occult blood test, Hemoccult. Cochrane Database Syst Rev (1): CD001216, 2007.17253456
Hewitson P, Glasziou P, Watson E, et al.: Cochrane systematic review of colorectal cancer screening using the fecal occult blood test (hemoccult): an update. Am J Gastroenterol 103 (6): 1541-9, 2008.18479499
Eddy DM: Screening for colorectal cancer. Ann Intern Med 113 (5): 373-84, 1990.2200321 90343176
Allison JE, Feldman R, Tekawa IS: Hemoccult screening in detecting colorectal neoplasm: sensitivity, specificity, and predictive value. Long-term follow-up in a large group practice setting. Ann Intern Med 112 (5): 328-33, 1990.2407166 90165119
Lindholm E, Brevinge H, Haglind E: Survival benefit in a randomized clinical trial of faecal occult blood screening for colorectal cancer. Br J Surg 95 (8): 1029-36, 2008.18563785
Hardcastle JD, Thomas WM, Chamberlain J, et al.: Randomised, controlled trial of faecal occult blood screening for colorectal cancer. Results for first 107,349 subjects. Lancet 1 (8648): 1160-4, 1989.2566735 89260698
Kronborg O, Fenger C, Søndergaard O, et al.: Initial mass screening for colorectal cancer with fecal occult blood test. A prospective randomized study at Funen in Denmark. Scand J Gastroenterol 22 (6): 677-86, 1987.3659830 88017816
Kronborg O, Fenger C, Olsen J, et al.: Repeated screening for colorectal cancer with fecal occult blood test. A prospective randomized study at Funen, Denmark. Scand J Gastroenterol 24 (5): 599-606, 1989.2762760 89346659
Mandel JS, Church TR, Ederer F, et al.: Colorectal cancer mortality: effectiveness of biennial screening for fecal occult blood. J Natl Cancer Inst 91 (5): 434-7, 1999.10070942 99168490
Lang CA, Ransohoff DF: Fecal occult blood screening for colorectal cancer. Is mortality reduced by chance selection for screening colonoscopy? JAMA 271 (13): 1011-3, 1994.8139058 94187126
Ederer F, Church TR, Mandel JS: Fecal occult blood screening in the Minnesota study: role of chance detection of lesions. J Natl Cancer Inst 89 (19): 1423-8, 1997.9326911 97467702
Shaukat A, Mongin SJ, Geisser MS, et al.: Long-term mortality after screening for colorectal cancer. N Engl J Med 369 (12): 1106-14, 2013.24047060
Mandel JS, Church TR, Bond JH, et al.: The effect of fecal occult-blood screening on the incidence of colorectal cancer. N Engl J Med 343 (22): 1603-7, 2000.11096167 20527307
Hardcastle JD, Chamberlain JO, Robinson MH, et al.: Randomised controlled trial of faecal-occult-blood screening for colorectal cancer. Lancet 348 (9040): 1472-7, 1996.8942775 97098234
Robinson MH, Hardcastle JD, Moss SM, et al.: The risks of screening: data from the Nottingham randomised controlled trial of faecal occult blood screening for colorectal cancer. Gut 45 (4): 588-92, 1999.10486370 99417651
Scholefield JH, Moss S, Sufi F, et al.: Effect of faecal occult blood screening on mortality from colorectal cancer: results from a randomised controlled trial. Gut 50 (6): 840-4, 2002.12010887 22006678
Scholefield JH, Moss SM, Mangham CM, et al.: Nottingham trial of faecal occult blood testing for colorectal cancer: a 20-year follow-up. Gut 61 (7): 1036-40, 2012.22052062
Kronborg O, Fenger C, Olsen J, et al.: Randomised study of screening for colorectal cancer with faecal-occult-blood test. Lancet 348 (9040): 1467-71, 1996.8942774 97098233
Jørgensen OD, Kronborg O, Fenger C: A randomised study of screening for colorectal cancer using faecal occult blood testing: results after 13 years and seven biennial screening rounds. Gut 50 (1): 29-32, 2002.11772963 21634534
Kronborg O, Jørgensen OD, Fenger C, et al.: Randomized study of biennial screening with a faecal occult blood test: results after nine screening rounds. Scand J Gastroenterol 39 (9): 846-51, 2004.15513382
Moayyedi P, Achkar E: Does fecal occult blood testing really reduce mortality? A reanalysis of systematic review data. Am J Gastroenterol 101 (2): 380-4, 2006.16454847
Knudsen AB, Zauber AG, Rutter CM, et al.: Estimation of Benefits, Burden, and Harms of Colorectal Cancer Screening Strategies: Modeling Study for the US Preventive Services Task Force. JAMA 315 (23): 2595-609, 2016.27305518
Mandel JS, Bond JH, Church TR, et al.: Reducing mortality from colorectal cancer by screening for fecal occult blood. Minnesota Colon Cancer Control Study. N Engl J Med 328 (19): 1365-71, 1993.8474513 93233727
Kewenter J, Björk S, Haglind E, et al.: Screening and rescreening for colorectal cancer. A controlled trial of fecal occult blood testing in 27,700 subjects. Cancer 62 (3): 645-51, 1988.3292038 88270337
Grazzini G, Visioli CB, Zorzi M, et al.: Immunochemical faecal occult blood test: number of samples and positivity cutoff. What is the best strategy for colorectal cancer screening? Br J Cancer 100 (2): 259-65, 2009.19142185
Lin JS, Piper MA, Perdue LA, et al.: Screening for Colorectal Cancer: Updated Evidence Report and Systematic Review for the US Preventive Services Task Force. JAMA 315 (23): 2576-94, 2016.27305422
Imperiale TF, Gruber RN, Stump TE, et al.: Performance Characteristics of Fecal Immunochemical Tests for Colorectal Cancer and Advanced Adenomatous Polyps: A Systematic Review and Meta-analysis. Ann Intern Med 170 (5): 319-329, 2019.30802902
Zorzi M, Hassan C, Capodaglio G, et al.: Divergent Long-Term Detection Rates of Proximal and Distal Advanced Neoplasia in Fecal Immunochemical Test Screening Programs: A Retrospective Cohort Study. Ann Intern Med 169 (9): 602-609, 2018.30285055
Jensen CD, Corley DA, Quinn VP, et al.: Fecal Immunochemical Test Program Performance Over 4 Rounds of Annual Screening: A Retrospective Cohort Study. Ann Intern Med 164 (7): 456-63, 2016.26811150
Brenner H, Tao S, Haug U: Low-dose aspirin use and performance of immunochemical fecal occult blood tests. JAMA 304 (22): 2513-20, 2010.21139112
Fath RB, Winawer SJ: Endoscopic screening by flexible fiberoptic sigmoidoscopy. Front Gastrointest Res 10: 102-111, 1986.
Read TE, Read JD, Butterly LF: Importance of adenomas 5 mm or less in diameter that are detected by sigmoidoscopy. N Engl J Med 336 (1): 8-12, 1997.8970934 97122456
Wallace MB, Kemp JA, Trnka YM, et al.: Is colonoscopy indicated for small adenomas found by screening flexible sigmoidoscopy? Ann Intern Med 129 (4): 273-8, 1998.9729179 98382167
Levin TR, Palitz A, Grossman S, et al.: Predicting advanced proximal colonic neoplasia with screening sigmoidoscopy. JAMA 281 (17): 1611-7, 1999.10235154 99249233
Soetikno RM, Kaltenbach T, Rouse RV, et al.: Prevalence of nonpolypoid (flat and depressed) colorectal neoplasms in asymptomatic and symptomatic adults. JAMA 299 (9): 1027-35, 2008.18319413
Tinmouth J, Vella ET, Baxter NN, et al.: Colorectal Cancer Screening in Average Risk Populations: Evidence Summary. Can J Gastroenterol Hepatol 2016: 2878149, 2016.27597935
Swartz AW, Eberth JM, Josey MJ, et al.: Reanalysis of All-Cause Mortality in the U.S. Preventive Services Task Force 2016 Evidence Report on Colorectal Cancer Screening. Ann Intern Med 167 (8): 602-603, 2017.28828493
Miller EA, Pinsky PF, Schoen RE, et al.: Effect of flexible sigmoidoscopy screening on colorectal cancer incidence and mortality: long-term follow-up of the randomised US PLCO cancer screening trial. Lancet Gastroenterol Hepatol 4 (2): 101-110, 2019.30502933
Holme Ø, Løberg M, Kalager M, et al.: Long-Term Effectiveness of Sigmoidoscopy Screening on Colorectal Cancer Incidence and Mortality in Women and Men: A Randomized Trial. Ann Intern Med 168 (11): 775-782, 2018.29710125
Juul FE, Cross AJ, Schoen RE, et al.: 15-Year Benefits of Sigmoidoscopy Screening on Colorectal Cancer Incidence and Mortality : A Pooled Analysis of Randomized Trials. Ann Intern Med 175 (11): 1525-1533, 2022.36215714
Lieberman DA, Weiss DG; Veterans Affairs Cooperative Study Group 380: One-time screening for colorectal cancer with combined fecal occult-blood testing and examination of the distal colon. N Engl J Med 345 (8): 555-60, 2001.11529208 21394599
Kato J, Morikawa T, Kuriyama M, et al.: Combination of sigmoidoscopy and a fecal immunochemical test to detect proximal colon neoplasia. Clin Gastroenterol Hepatol 7 (12): 1341-6, 2009.19426835
Bretthauer M, Løberg M, Wieszczy P, et al.: Effect of Colonoscopy Screening on Risks of Colorectal Cancer and Related Death. N Engl J Med 387 (17): 1547-1556, 2022.36214590
Dominitz JA, Robertson DJ: Understanding the Results of a Randomized Trial of Screening Colonoscopy. N Engl J Med 387 (17): 1609-1611, 2022.36214591
Barclay RL, Vicari JJ, Doughty AS, et al.: Colonoscopic withdrawal times and adenoma detection during screening colonoscopy. N Engl J Med 355 (24): 2533-41, 2006.17167136
Brenner H, Altenhofen L, Kretschmann J, et al.: Trends in Adenoma Detection Rates During the First 10 Years of the German Screening Colonoscopy Program. Gastroenterology 149 (2): 356-66.e1, 2015.25911510
Lieberman D: Nonpolypoid colorectal neoplasia in the United States: the parachute is open. JAMA 299 (9): 1068-9, 2008.18319420
Robertson DJ, Lieberman DA, Winawer SJ, et al.: Colorectal cancers soon after colonoscopy: a pooled multicohort analysis. Gut 63 (6): 949-56, 2014.23793224
Corley DA, Jensen CD, Marks AR, et al.: Adenoma detection rate and risk of colorectal cancer and death. N Engl J Med 370 (14): 1298-306, 2014.24693890
Nishihara R, Wu K, Lochhead P, et al.: Long-term colorectal-cancer incidence and mortality after lower endoscopy. N Engl J Med 369 (12): 1095-105, 2013.24047059
Baxter NN, Goldwasser MA, Paszat LF, et al.: Association of colonoscopy and death from colorectal cancer. Ann Intern Med 150 (1): 1-8, 2009.19075198
Brenner H, Chang-Claude J, Seiler CM, et al.: Protection from colorectal cancer after colonoscopy: a population-based, case-control study. Ann Intern Med 154 (1): 22-30, 2011.21200035
Doubeni CA, Weinmann S, Adams K, et al.: Screening colonoscopy and risk for incident late-stage colorectal cancer diagnosis in average-risk adults: a nested case-control study. Ann Intern Med 158 (5 Pt 1): 312-20, 2013.23460054
Smith MJ: Colon cancer screening hitting its stride but obstacles impair reaching final goal. Gastroenterology and Endoscopy News 59 (3): 9, 2008. [Refer to "Screening: it’s not just a good idea, it’s the law … almost" within the article].
Bretthauer M, Ekbom A, Malila N, et al.: [Politics and science in colorectal cancer screening] Tidsskr Nor Laegeforen 126 (13): 1766-7, 2006.16794676
Ma W, Wang K, Nguyen LH, et al.: Association of Screening Lower Endoscopy With Colorectal Cancer Incidence and Mortality in Adults Older Than 75 Years. JAMA Oncol 7 (7): 985-992, 2021.34014275
Ferrucci JT: Colon cancer screening with virtual colonoscopy: promise, polyps, politics. AJR Am J Roentgenol 177 (5): 975-88, 2001.11641151 21520794
Johnson CD, Chen MH, Toledano AY, et al.: Accuracy of CT colonography for detection of large adenomas and cancers. N Engl J Med 359 (12): 1207-17, 2008.18799557
Regge D, Laudi C, Galatola G, et al.: Diagnostic accuracy of computed tomographic colonography for the detection of advanced neoplasia in individuals at increased risk of colorectal cancer. JAMA 301 (23): 2453-61, 2009.19531785
Iannaccone R, Laghi A, Catalano C, et al.: Computed tomographic colonography without cathartic preparation for the detection of colorectal polyps. Gastroenterology 127 (5): 1300-11, 2004.15520999
Zalis ME, Blake MA, Cai W, et al.: Diagnostic accuracy of laxative-free computed tomographic colonography for detection of adenomatous polyps in asymptomatic adults: a prospective evaluation. Ann Intern Med 156 (10): 692-702, 2012.22586008
Edwards JT, Wood CJ, Mendelson RM, et al.: Extracolonic findings at virtual colonoscopy: implications for screening programs. Am J Gastroenterol 96 (10): 3009-12, 2001.11693340 21544700
Hellström M, Svensson MH, Lasson A: Extracolonic and incidental findings on CT colonography (virtual colonoscopy). AJR Am J Roentgenol 182 (3): 631-8, 2004.14975961
Gluecker TM, Johnson CD, Wilson LA, et al.: Extracolonic findings at CT colonography: evaluation of prevalence and cost in a screening population. Gastroenterology 124 (4): 911-6, 2003.12671887 22557583
Pickhardt PJ, Hanson ME, Vanness DJ, et al.: Unsuspected extracolonic findings at screening CT colonography: clinical and economic impact. Radiology 249 (1): 151-9, 2008.18796673
Kimberly JR, Phillips KC, Santago P, et al.: Extracolonic findings at virtual colonoscopy: an important consideration in asymptomatic colorectal cancer screening. J Gen Intern Med 24 (1): 69-73, 2009.18958531
Mulhall BP, Veerappan GR, Jackson JL: Meta-analysis: computed tomographic colonography. Ann Intern Med 142 (8): 635-50, 2005.15838071
Herrinton LJ, Selby JV, Friedman GD, et al.: Case-control study of digital-rectal screening in relation to mortality from cancer of the distal rectum. Am J Epidemiol 142 (9): 961-4, 1995.7572977 96041931
Kinzler KW, Vogelstein B: Lessons from hereditary colorectal cancer. Cell 87 (2): 159-70, 1996.8861899 97015071
Dong SM, Traverso G, Johnson C, et al.: Detecting colorectal cancer in stool with the use of multiple genetic targets. J Natl Cancer Inst 93 (11): 858-65, 2001.11390535 21286553
Traverso G, Shuber A, Levin B, et al.: Detection of APC mutations in fecal DNA from patients with colorectal tumors. N Engl J Med 346 (5): 311-20, 2002.11821507 21679635
Traverso G, Shuber A, Olsson L, et al.: Detection of proximal colorectal cancers through analysis of faecal DNA. Lancet 359 (9304): 403-4, 2002.11844514 21833712
Ahlquist DA, Skoletsky JE, Boynton KA, et al.: Colorectal cancer screening by detection of altered human DNA in stool: feasibility of a multitarget assay panel. Gastroenterology 119 (5): 1219-27, 2000.11054379 20509958
Imperiale TF, Ransohoff DF, Itzkowitz SH, et al.: Fecal DNA versus fecal occult blood for colorectal-cancer screening in an average-risk population. N Engl J Med 351 (26): 2704-14, 2004.15616205
Woolf SH: A smarter strategy? Reflections on fecal DNA screening for colorectal cancer. N Engl J Med 351 (26): 2755-8, 2004.15616212
Imperiale TF, Ransohoff DF, Itzkowitz SH, et al.: Multitarget stool DNA testing for colorectal-cancer screening. N Engl J Med 370 (14): 1287-97, 2014.24645800
Imperiale TF, Porter K, Zella J, et al.: Next-Generation Multitarget Stool DNA Test for Colorectal Cancer Screening. N Engl J Med 390 (11): 984-993, 2024.38477986
Chung DC, Gray DM, Singh H, et al.: A Cell-free DNA Blood-Based Test for Colorectal Cancer Screening. N Engl J Med 390 (11): 973-983, 2024.38477985
Gupta S, Halm EA, Rockey DC, et al.: Comparative effectiveness of fecal immunochemical test outreach, colonoscopy outreach, and usual care for boosting colorectal cancer screening among the underserved: a randomized clinical trial. JAMA Intern Med 173 (18): 1725-32, 2013.23921906
Imperiale TF, Monahan PO, Stump TE, et al.: Derivation and Validation of a Scoring System to Stratify Risk for Advanced Colorectal Neoplasia in Asymptomatic Adults: A Cross-sectional Study. Ann Intern Med 163 (5): 339-46, 2015.26259154
Chiu HM, Ching JY, Wu KC, et al.: A Risk-Scoring System Combined With a Fecal Immunochemical Test Is Effective in Screening High-Risk Subjects for Early Colonoscopy to Detect Advanced Colorectal Neoplasms. Gastroenterology 150 (3): 617-625.e3, 2016.26627608

## Evidence of Harms

Potential harms are associated with the modalities used to screen for colorectal cancer (CRC), some of which have sufficient evidence and some that do not.

### Overview

The tables for each screening test below show the magnitude of burden for several categories of harms encountered along the screening cascade. The magnitude of harms is a combination of the frequency and severity of harm, as perceived by the patient.

Harms are defined broadly as any negative effect on individuals or populations resulting from being involved in the screening process (cascade) compared with not screening. Potential harms are organized according to the type of harm (e.g., physical, psychological, and hassle/opportunity costs) and when they occur in the screening cascade (e.g., screening test/workup; screening test/workup results; surveillance and surveillance results; and early treatment and overtreatment). For example, potential harms of screening colonoscopy include harms of the screening test itself (e.g., perforation and bleeding), results of the screening test (e.g., anxiety from an abnormal result), surveillance (e.g., harms of more frequent colonoscopies), and treatment (e.g., earlier treatment or overtreatment). Harms are also associated with the workup for other colorectal cancer screening tests (e.g., colonoscopy for positive fecal occult blood test [FOBT]). A recent study of three major hospitals found that 71% of endoscopes tested positive for bacteria after cleaning and high-level disinfection of the scopes. This raises concern for endoscopy-associated pathogen transmission and patient safety, although no patients were involved in the study and the implications for patients are unknown.[1] For all aspects of participating in the screening cascade, there are time/effort and opportunity costs (nonfinancial harms) for the patient. The following tables do not include any financial harms to the patient/family, nor any psychological harm from anticipation of future financial costs related to screening.

Table 4. Colonoscopy

Stage of Screening Cascade
| Physical | Psychological | Time/Effort, Opportunity
Screening Test/Workup | Average 0.3% complications requiring hospitalization or resulting in death, higher with polypectomy and in older patients (fair evidence) | Percentage of people who suffer psychological distress on consideration of having colonoscopy; severity and duration (insufficient evidence) | About 38 hours (median) required for preparation, procedure, sedation (one study, fair evidence) [2]
Screening Test/Workup | Discomfort of preparation and procedure; adverse effects of preparation (insufficient evidence to determine magnitude and frequency) | Percentage of people who suffer psychological distress on consideration of having colonoscopy; severity and duration (insufficient evidence) | About 38 hours (median) required for preparation, procedure, sedation (one study, fair evidence) [2]
Screening Test/Workup | Complications from sedation during procedure (insufficient evidence to determine magnitude and frequency) | Percentage of people who suffer psychological distress on consideration of having colonoscopy; severity and duration (insufficient evidence) | About 38 hours (median) required for preparation, procedure, sedation (one study, fair evidence) [2]
Screening Test/Workup Results | Increased risk of suicide and cardiovascular mortality soon after diagnosis (insufficient evidence) | Percentage of people who suffer psychological distress after receiving positive screening and/or pathological results; severity and duration (insufficient evidence) | Time and effort required to receive and understand screening test or workup results, including extra physician visits for positive tests (insufficient evidence)
Surveillance/Results | More frequent colonoscopy | Percentage of people who suffer psychological distress after receiving positive screening and/or pathological results; severity and duration (insufficient evidence) | Time and effort required to undergo colonoscopy (median, 38 hours, see above)
Surveillance/Results | More frequent colonoscopy | Percentage of people who suffer psychological distress after receiving positive screening and/or pathological results; severity and duration (insufficient evidence) | Time and effort required to receive and understand surveillance results (insufficient evidence)
Treatment (Early Treatment and Overtreatment) | Overdiagnosis and overtreatment of precursor polyps or earlier treatment of CRC (may or may not receive benefit from earlier treatment) (insufficient evidence) | Percentage of people who suffer psychological distress after undergoing overtreatment or earlier treatment without benefit; severity and duration (insufficient evidence) | Time and effort required to receive overtreatment or earlier treatment without benefit (insufficient evidence)

CRC = colorectal cancer.

Table 5. FOBT/FIT, Other Stool-Based Tests (Including Fecal DNA)

Stage of Screening Cascade
| Physical | Psychological | Time/Effort, Opportunity
Screening Test | None (no evidence) | Percentage of people who suffer psychological distress on consideration of having CRC screening; severity and duration (insufficient evidence) | Time and effort required to change diet (if required), collect samples, and return to appropriate facility (insufficient evidence)
Screening Test Results | N/A | Percentage of people who suffer psychological distress after receiving positive screening results; severity and duration (insufficient evidence) | Time and effort required to receive and understand screening test results, including extra physician visits or communication for positive tests (insufficient evidence)
Workup^a^ | See colonoscopy | See colonoscopy | See colonoscopy
Workup Results | N/A | See colonoscopy | See colonoscopy
Surveillance/Results | See colonoscopy | See colonoscopy | See colonoscopy
Treatment (Early Treatment and Overtreatment)^b^ | See colonoscopy | See colonoscopy | See colonoscopy

CRC = colorectal cancer; FIT= immunochemical fecal occult blood test; FOBT= fecal occult blood test; N/A = not applicable.

^a^Workup test is colonoscopy. Descriptions of the associated harms can be found in the colonoscopy section (for more information, see the Colonoscopy section in Evidence of Harms).

^b^Treatment harms will be the same for all screening tests.

Table 6. Flexible Sigmoidoscopy

Stage of Screening Cascade
| Physical | Psychological | Time/Effort, Opportunity
Screening Test | Average serious complications for 0.03% of patients (fair evidence) [3] | Percentage of people who suffer psychological distress on consideration of having colonoscopy; severity and duration (insufficient evidence) | Time and effort required to perform preparation, travel to and attend screening, return to usual activities (insufficient evidence)
Screening Test Results | N/A | See colonoscopy | See colonoscopy
Workup^a^ | See colonoscopy | See colonoscopy | See colonoscopy
Surveillance/Results | N/A | See colonoscopy | See colonoscopy
Treatment (Early Treatment and Overtreatment)^b^ | See colonoscopy | See colonoscopy | See colonoscopy

N/A = not applicable.

^a^Workup test is colonoscopy. Descriptions of the associated harms can be found in the colonoscopy section (for more information, see the Colonoscopy section in Evidence of Harms).

^b^Treatment harms will be the same for all screening tests.

Table 7. Computed Tomography Colonography

Stage of Screening Cascade
| Physical | Psychological | Time/Effort, Opportunity
Screening Test/Workup | Discomfort of preparation and procedure; radiation exposure (insufficient evidence) | Percentage of people who suffer psychological distress on consideration of screening; severity and duration (insufficient evidence) | Time required for preparation, procedure (exact time and effort uncertain) (insufficient evidence)
Screening Test/Workup Results | Increased risk of suicide and cardiovascular mortality soon after diagnosis (insufficient evidence) | Percentage of people who suffer psychological distress after receiving positive screening and/or pathological results; severity and duration (insufficient evidence) | Time and effort required to receive and understand screening test or workup results, including extra physician visits for positive tests (insufficient evidence)
Screening Test/Workup Results | Incidental extra-colonic findings [3] | Percentage of people who suffer psychological distress after receiving positive screening and/or pathological results; severity and duration (insufficient evidence) | Time and effort required to receive and understand screening test or workup results, including extra physician visits for positive tests (insufficient evidence)
Surveillance/Results | More frequent colonoscopy | Percentage of people who suffer psychological distress after receiving positive screening and/or pathological results; severity and duration (insufficient evidence) | Time and effort required to undergo colonoscopy (mean, 38 hours, see Table 4)
Surveillance/Results | More frequent colonoscopy | Percentage of people who suffer psychological distress after receiving positive screening and/or pathological results; severity and duration (insufficient evidence) | Time and effort required to receive and understand surveillance results (insufficient evidence)
Treatment (Early Treatment and Overtreatment) | Overdiagnosis and overtreatment of precursor polyps or earlier treatment of CRC (may or may not receive benefit from earlier treatment) (insufficient evidence) | Percentage of people who suffer psychological distress undergoing overtreatment or earlier treatment without benefit; severity and duration (insufficient evidence) | Time and effort required to receive overtreatment or earlier treatment without benefit (insufficient evidence)

CRC = colorectal cancer.

### Evidence Summary

#### Colonoscopy

The potential physical harms of colonoscopy include adverse effects from the preparation and adverse effects from the procedure (e.g., colonic perforation, bleeding, effects of sedation).[4-6] A systematic review of 60 studies that assessed complications of colonoscopy screening in asymptomatic patients found infrequent serious morbidity, which comprised major bleeding (0.8/1,000 procedures; 95% confidence interval [CI], 0.18–1.63) and perforation (0.07/1,000 procedures; 95% CI, 0.006–0.17), and only minor and short-lasting psychological harms.[7] These complications can be serious, requiring hospitalization. Colonic perforation and serious bleeding occur more often with biopsy or polypectomy, with an overall average of three to five serious complications per 1,000 procedures. The physical harm of discomfort during the procedure has been reduced by sedation, although sedation has its own potential for physical harm (magnitude and severity uncertain because of insufficient evidence).

Physical harms are also associated with further steps in the screening cascade. These harms include diagnosis of CRC (some large ecological studies have shown an increase in suicide soon after diagnosis) and overdiagnosis/overtreatment due to treating lesions that would never have caused the patient important problems (evidence insufficient to determine magnitude and severity).

The potential psychological harms of colonoscopy include anticipation of the procedure and anxiety while awaiting the results of biopsy reports. For people with polyps, there may be increased distress in considering oneself at increased risk of CRC (evidence insufficient). For people newly diagnosed with CRC, many will experience increased anxiety and depression for at least 6 months, as prognosis and treatment are discussed (evidence insufficient).

The harm of time/effort and opportunity costs involved in moving through the demands of the screening cascade are present throughout the process (evidence insufficient to determine frequency and severity).

#### FOBT/immunochemical FOBT (FIT)

The potential physical harms of fecal-based testing include the same harms as for colonoscopy for people with a positive test who have been referred for diagnostic colonoscopy.

The potential psychological harms, as well as time/effort and opportunity costs are also similar to the description above for colonoscopy (for more information, see the Colonoscopy section in Evidence of Harms).[8] These harms are associated with moving through the screening cascade, regardless of the initial screening test. Although it is highly likely that these psychological harms, plus time/effort and opportunity costs, do occur, the exact frequency and severity of these harms are uncertain because of insufficient evidence.

#### Sigmoidoscopy

The potential physical harms of sigmoidoscopy are considerably less than those of colonoscopy, with a less intensive preparation. Serious procedural complications occur in approximately three in 10,000 sigmoidoscopies, compared with in three in 1,000 colonoscopies.[3] There is usually no sedation with sigmoidoscopy, which lowers the potential for complications even further.

The potential psychological harms of sigmoidoscopy screening, as well as the time/effort and opportunity costs of screening, are the same as given above for other screening strategies.

#### Computed tomography colonography (CTC)

The potential physical harms due directly to CTC are less than either colonoscopy or sigmoidoscopy, with rare procedural complications.[3] However, CTC does involve repeated radiation exposure, with uncertain associated harms, and it also detects a number of extra-colonic incidental findings.[9 -13] Incidental findings have been detected in 40% to 98% of CTCs, with a variable number of these considered significant enough to proceed with further diagnostic testing. As there is little evidence that early detection of any of these findings could improve health outcomes for patients, these findings may be considered as harms until proven otherwise.

The potential psychological harms or time/effort and opportunity costs for CTC are similar to the descriptions above for patients moving through the screening cascade (evidence insufficient to determine frequency and severity).

### References

Ofstead CL, Heymann OL, Quick MR, et al.: Residual moisture and waterborne pathogens inside flexible endoscopes: Evidence from a multisite study of endoscope drying effectiveness. Am J Infect Control 46 (6): 689-696, 2018.29609854
Jonas DE, Russell LB, Sandler RS, et al.: Value of patient time invested in the colonoscopy screening process: time requirements for colonoscopy study. Med Decis Making 28 (1): 56-65, 2008 Jan-Feb.18263561
Whitlock EP, Lin JS, Liles E, et al.: Screening for colorectal cancer: a targeted, updated systematic review for the U.S. Preventive Services Task Force. Ann Intern Med 149 (9): 638-58, 2008.18838718
Lin JS, Piper MA, Perdue LA, et al.: Screening for Colorectal Cancer: Updated Evidence Report and Systematic Review for the US Preventive Services Task Force. JAMA 315 (23): 2576-94, 2016.27305422
Levin TR, Zhao W, Conell C, et al.: Complications of colonoscopy in an integrated health care delivery system. Ann Intern Med 145 (12): 880-6, 2006.17179057
Warren JL, Klabunde CN, Mariotto AB, et al.: Adverse events after outpatient colonoscopy in the Medicare population. Ann Intern Med 150 (12): 849-57, W152, 2009.19528563
Vermeer NC, Snijders HS, Holman FA, et al.: Colorectal cancer screening: Systematic review of screen-related morbidity and mortality. Cancer Treat Rev 54: 87-98, 2017.28236723
Bobridge A, Bampton P, Cole S, et al.: The psychological impact of participating in colorectal cancer screening by faecal immuno-chemical testing--the Australian experience. Br J Cancer 111 (5): 970-5, 2014.24983363
Kimberly JR, Phillips KC, Santago P, et al.: Extracolonic findings at virtual colonoscopy: an important consideration in asymptomatic colorectal cancer screening. J Gen Intern Med 24 (1): 69-73, 2009.18958531
Yee J, Kumar NN, Godara S, et al.: Extracolonic abnormalities discovered incidentally at CT colonography in a male population. Radiology 236 (2): 519-26, 2005.16040909
Hara AK, Johnson CD, MacCarty RL, et al.: Incidental extracolonic findings at CT colonography. Radiology 215 (2): 353-7, 2000.10796907
Gluecker TM, Johnson CD, Wilson LA, et al.: Extracolonic findings at CT colonography: evaluation of prevalence and cost in a screening population. Gastroenterology 124 (4): 911-6, 2003.12671887 22557583
Xiong T, McEvoy K, Morton DG, et al.: Resources and costs associated with incidental extracolonic findings from CT colonogaphy: a study in a symptomatic population. Br J Radiol 79 (948): 948-61, 2006.16822798

## Latest Updates to This Summary (04/10/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Significance

Updated statistics with estimated new cases and deaths for 2025 (cited Bray et al. as reference 1 and American Cancer Society as reference 2). Also revised text to state that between 2012 and 2021, incidence rates increased by 2.4% per year in individuals younger than 55 years and by 0.4% per year in individuals aged 50 to 64 years.

This summary is written and maintained by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about colorectal cancer screening. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Screening and Prevention Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Colorectal Cancer Screening. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/colorectal/hp/colorectal-screening-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389266]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).